# Childhood Vascular Tumors (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood vascular tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What are childhood vascular tumors?

Childhood vascular tumors are abnormal growths of blood vessels or lymph vessels that can occur anywhere in the body. These tumors may be benign (which means they are not cancer) or cancer. There are many types of vascular tumors. The most common type is infantile hemangioma, which is a benign tumor that usually goes away on its own.

## Tests to diagnose childhood vascular tumors

If your child has symptoms, such as discoloration on or under the skin, that suggest a vascular tumor, the doctor will need to find out if these are due to a vascular tumor or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family health history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with a vascular tumor, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose a vascular tumor in children may include:

### Ultrasound exam

An ultrasound uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.

Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).

Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).

### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

### Chest x-ray

An x-ray is a type of radiation that can go through the body and make pictures. A chest x-ray makes pictures of the organs and bones inside the chest.

### Biopsy

Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for cancer. While a biopsy is not always needed to diagnose a vascular tumor, it may help find gene mutations that will help with treatment planning.

## Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, visit Finding Health Care Services (https://www.cancer.gov/about-cancer/managing-care/services). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

## Types of childhood vascular tumors

### Benign tumors

Benign vascular tumors are not cancer.

#### Infantile hemangioma

Infantile hemangioma (also called a strawberry mark) is the most common type of benign vascular tumor in children. It occurs when immature cells that are meant to form blood vessels form a tumor instead. It tends to appear between the ages of 3 to 6 weeks and is usually not seen at birth. The hemangioma often gets bigger for about 5 months and then stops growing. It slowly fades over the next several years, but a red mark or loose or wrinkled skin may remain. It is rare for an infantile hemangioma to come back after it has faded away.

Infantile hemangioma can develop anywhere on the body, including the skin, the tissue below the skin, or within an organ. It most commonly appears on the skin on the head and neck. Hemangioma may be a single lesion, one or more lesions spread over a larger area, or multiple lesions in different parts of the body. A hemangioma that covers a larger area, involves an organ, or has multiple lesions is more likely to cause problems.

- Hemangioma in the airway usually occurs along with a large hemangioma on the face that looks like a beard. Airway hemangioma may cause the airway to narrow, leading to trouble breathing.
- Periocular hemangioma involves the eye or tissues around the eye. It may cause vision problems or blindness and is sometimes linked with other eye problems.
- Having more than five hemangiomas on the skin is a sign that there may be hemangiomas in an organ, such as the liver, heart, muscle, or thyroid gland. The liver is affected most often.

Some hemangiomas appear between the ages of 3 to 6 weeks but do not grow bigger. This type of hemangioma is called infantile hemangioma with minimal or arrested growth. The lesion appears as light and dark areas of redness on the skin of the lower body or the head and neck. Hemangiomas of this type go away over time without treatment.

##### Causes and risk factors for infantile hemangioma

Infantile hemangioma is caused by certain changes to how the vascular cells function, especially how they grow and divide into new cells. Often, the exact cause of these changes is unknown.

A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop an infantile hemangioma. And it can develop in some children who don't have a known risk factor.

Infantile hemangioma is more common in:

- girls
- White people
- premature babies
- twins, triplets, or other multiple births
- babies conceived using in vitro fertilization
- babies of mothers who are older at the time of the pregnancy, have pre-eclampsia (high blood pressure during pregnancy), or who have problems with the placenta during pregnancy

Other risk factors for infantile hemangioma include:

- Having a family history of infantile hemangioma, usually in a mother, father, or sibling.
- Having PHACE syndrome, a rare disorder marked by problems that affect the large blood vessels, heart, eyes, and/or brain. PHACE syndrome increases the risk of a hemangioma that spreads across a large area of the head or face and sometimes the neck, chest, or arm.
- Having LUMBAR/PELVIS/SACRAL syndrome, a rare disorder marked by problems that affect the urinary system, genitals, rectum, anus, brain, spinal cord, and nerve functions. This syndrome increases the risk of a hemangioma that spreads across a large area of the lower back, arms, chest, or legs.

Talk with your child's doctor if you think your child may be at risk.

##### Symptoms of infantile hemangioma

Infantile hemangioma may cause any of the following symptoms. It's important to check with your child's doctor if your child has a:

- Lesion on the skin: An area of spidery veins or lightened or discolored skin may be the first sign of a hemangioma. This may develop into a firm, warm, bright red-to-crimson lesion on the skin that may look like a bruise. A lesion may also form an ulcer that is painful and can lead to bleeding, infection, and scarring. Later, as the hemangioma goes away, it becomes softer and begins fading in the center before flattening and losing color.
- Lesion below the skin: A lesion that grows under the skin in the fat may appear blue or purple. If the lesion is deep enough under the skin surface, it may not be seen.
- Lesion in an organ: There may be no symptoms if a hemangioma forms on an organ.

These symptoms may be caused by problems other than a hemangioma. The only way to know is for your child to see a doctor.

##### Diagnosis of infantile hemangioma

A physical exam and personal and family health history are usually all that are needed to diagnose infantile hemangioma. If the hemangioma looks unusual, a biopsy may be done. An ultrasound may be done if the hemangioma is deeper inside the body with no change to the skin or if the lesion covers a large area of the body. Infants with five or more hemangiomas on the skin should have an ultrasound of the liver to check for a liver hemangioma.

If the hemangioma is part of a syndrome, more tests, such as an echocardiogram, MRI, magnetic resonance angiogram, and eye exam, may be done.

Learn more about these tests in Tests to diagnose childhood vascular tumors.

##### Treatment of infantile hemangioma

Most hemangiomas fade and shrink without treatment. If a hemangioma is large, causing other health problems, or in an area where it could cause serious problems if it grows bigger, treatment may include:

- beta-blocker therapy, such as propranolol, nadolol, or atenolol
- topical beta-blocker therapy for a hemangioma that is in one area of the skin
- steroid therapy, which may be used when beta-blocker therapy is being started or when beta-blockers cannot be used
- laser surgery, including pulsed dye laser surgery, which may be used for a hemangioma that has an ulcer or has not completely gone away
- surgery for a hemangioma that has an ulcer, causes vision problems, has not completely gone away, or is on the face and has not responded to other treatment
- combined therapy, such as propranolol and steroid therapy or propranolol and topical beta-blocker therapy

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Congenital hemangioma

Congenital hemangioma is a benign vascular tumor that begins forming before birth and is fully formed when the baby is born. It is usually on the skin but can be in another organ. A congenital hemangioma may occur as a rash of purple spots. The skin around the spot may be lighter.

There are three types of congenital hemangiomas. The differences between the three types relate to how they shrink (involute) over time:

- Rapidly involuting congenital hemangioma (RICH) goes away on its own 12 to 15 months after birth. It can form an ulcer, bleed, and cause temporary heart and blood clotting problems. The skin may look a little different even after the hemangioma goes away.
- Partial involuting congenital hemangioma (PICH) may shrink on its own but does not go away completely.
- Non-involuting congenital hemangioma (NICH) stays the same size and never goes away on its own.

If your child has symptoms that suggest a congenital hemangioma, the doctor will ask about your child's personal health history and do a physical exam and ultrasound exam to make the diagnosis.

The types of treatment your child may receive depend on whether the congenital hemangioma will shrink on its own.

- Treatment of rapidly involuting congenital hemangioma and partial involuting congenital hemangioma may be observation.
- Treatment of non-involuting congenital hemangioma may be surgery to remove the tumor, depending on where it is and whether it is causing symptoms.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Benign vascular tumors of the liver

Benign vascular tumors of the liver may be:

- a single lesion in one part of the liver (focal vascular lesion)
- several lesions in one part of the liver (multiple liver lesions)
- several lesions spread across different parts of the liver (diffuse liver lesions)

The liver has many functions, including filtering blood and making proteins that help with blood clotting. Sometimes, the tumor can block or slow the normal flow of blood through the liver. When this happens, blood is sent directly to the heart without going through the liver. This condition is known as a liver shunt. It can cause heart failure and problems with blood clotting.

If your child has symptoms that suggest a benign vascular tumor of the liver, the doctor will ask about your child's personal health history and do a physical exam and ultrasound exam to make the diagnosis.

The treatment your child may receive depends on whether they have a focal vascular lesion, multiple liver lesions, or diffuse liver lesions.

A single lesion in one part of the liver (focal vascular lesion) is usually a rapidly involuting (shrinking) congenital hemangioma or a non-involuting congenital hemangioma. This lesion can be diagnosed before birth or shortly after the baby is born. Treatment of this type of lesion depends on whether symptoms occur and may include:

- observation
- embolization of the liver to treat symptoms
- surgery, for lesions that do not respond to other treatments

Multiple and diffuse liver lesions are usually infantile hemangiomas. Diffuse liver lesions can cause serious effects, including problems with thyroid hormones and the heart. The liver can enlarge, press on other organs, and cause more symptoms.

Treatment of multiple liver lesions may include:

- observation for lesions that do not cause symptoms
- beta-blocker therapy (propranolol) for lesions that begin to grow

Treatment of diffuse liver lesions may include:

- beta-blocker therapy (propranolol)
- chemotherapy
- steroid therapy
- total hepatectomy and liver transplant, for lesions that do not respond to drug therapy or for diffuse liver lesions that are spreading and causing organ failure and there is no time to start treatment

Children with diffuse liver lesions may be diagnosed with hypothyroidism caused by the liver tumor using more of the thyroid hormone. These children may need thyroid hormone replacement therapy.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

If a vascular liver lesion does not respond to treatment, a biopsy may be done to see if the tumor is cancer.

#### Spindle cell hemangioma

A spindle cell hemangioma contains cells called spindle cells. Under a microscope, spindle cells look long and slender. A spindle cell hemangioma is a painful red-brown or bluish lesion that usually appears on the arms or legs. It can begin as one lesion and develop into more lesions over the years. A spindle cell hemangioma can form in children and adults.

Some children may be at increased risk of developing a spindle cell hemangioma. A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop a spindle cell hemangioma. And it can develop in some children who don't have a known risk factor. Spindle cell hemangiomas are more likely to develop in children with the following syndromes:

- Maffucci syndrome, which affects cartilage and skin
- Klippel-Trenaunay syndrome, which affects blood vessels, soft tissues, and bones

Talk with your child's doctor if you think your child may be at risk.

If your child has symptoms that suggest a spindle cell hemangioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be done. Learn more about Tests to diagnose childhood vascular tumors.

Although there is no standard treatment for spindle cell hemangioma, surgery may be used to remove the tumor. Spindle cell hemangioma may come back after surgery.

#### Epithelioid hemangioma

An epithelioid hemangioma most often forms on or in the skin, especially the head, but can occur in other areas, such as bone. An epithelioid hemangioma is sometimes caused by injury. It occurs in children and adults.

On the skin, an epithelioid hemangioma may appear as firm pink-to-red bumps and may be itchy. Epithelioid hemangioma of the bone may cause swelling, pain, and weakened bone in the affected area or symptoms of nerve injury. These symptoms may be caused by problems other than an epithelioid hemangioma. The only way to know is for your child to see a doctor.

If your child has symptoms that suggest an epithelioid hemangioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. An MRI, x-ray, or biopsy may also be done. Learn more about Tests to diagnose childhood vascular tumors.

There is no standard treatment for epithelioid hemangioma. Treatment may include:

- surgery (curettage or resection)
- sclerotherapy
- radiation therapy in rare cases

Epithelioid hemangioma often comes back after treatment.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Pyogenic granuloma

Pyogenic granuloma is also called lobular capillary hemangioma. It is most common in older children and young adults but can occur at any age.

Pyogenic granuloma is sometimes caused by injury or from the use of certain medicines, including birth control pills and retinoids. It may also form for no known reason inside capillaries (the smallest blood vessels), arteries, veins, or other places on the body. Some lesions may be associated with capillary malformations.

Pyogenic granuloma is a raised, bright red lesion that may be small or large and smooth or bumpy. It grows quickly over weeks to months and may bleed a lot. The lesion is on the skin's surface but may form in the tissues below the skin and look like other vascular lesions. Usually, there is only one lesion. Sometimes multiple lesions can occur in the same area or on different parts of the body. The only way to know if these symptoms are caused by a pyogenic granuloma is for your child to see a doctor.

If your child has symptoms that suggest a pyogenic granuloma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn more about Tests to diagnose childhood vascular tumors.

Pyogenic granuloma can go away without treatment. Sometimes a pyogenic granuloma needs treatment that may include:

- surgery (excision or curettage) to remove the lesion
- photocoagulation
- cryotherapy
- topical beta-blocker therapy (propranolol or timolol)

Pyogenic granuloma often comes back after treatment.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Angiofibroma

Angiofibroma is rare and appears as red bumps on the face. It is a benign skin lesion that usually occurs with tuberous sclerosis, an inherited disorder that causes skin lesions, seizures, and mental disabilities. Talk to your child's doctor if you think your child may have an angiofibroma.

If your child has symptoms that suggest an angiofibroma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn more about Tests to diagnose childhood vascular tumors.

Treatment of angiofibroma may include:

- surgery to remove the tumor
- laser therapy
- targeted therapy (sirolimus)

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Juvenile nasopharyngeal angiofibroma

Juvenile nasopharyngeal angiofibroma is a tumor that is not cancer but can grow into nearby tissues. It is most common in males and may form around the time of puberty. Juvenile nasopharyngeal angiofibroma begins in the nasal cavity and may spread to the nasopharynx, the paranasal sinuses, the bone around the eyes, and sometimes to the brain.

If your child has symptoms that suggest juvenile nasopharyngeal angiofibroma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn more about Tests to diagnose childhood vascular tumors.

Treatment of juvenile nasopharyngeal angiofibroma may include:

- surgery to remove the tumor
- radiation therapy
- chemotherapy
- immunotherapy (interferon)
- targeted therapy (sirolimus)

This tumor may come back after treatment.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

### Intermediate tumors that may spread locally

Some intermediate tumors are likely to spread to the area around the tumor (locally), but not to other parts of the body.

#### Kaposiform hemangioendothelioma and tufted angioma

Kaposiform hemangioendothelioma and tufted angioma are blood vessel tumors that occur in infants or young children and affect males and females equally. These tumors can cause Kasabach-Merritt phenomenon, a condition in which the blood is not able to clot and serious bleeding may occur. This type of vascular tumor is not related to Kaposi sarcoma.

##### Symptoms of kaposiform hemangioendothelioma and tufted angioma

Kaposiform hemangioendothelioma and tufted angioma usually occur on the skin of the arms and legs, but may also form in deeper tissues, such as muscle or bone, or in the chest, abdomen, head, or neck.

Symptoms may include:

- firm, warm, painful areas of skin that look bruised
- purple or brownish-red areas of skin
- pain with no visible lump
- easy bruising
- bleeding more than the usual amount from mucous membranes, wounds, and other tissues

People who have kaposiform hemangioendothelioma or tufted angioma may have anemia (weakness, feeling tired, or looking pale).

These symptoms may be caused by problems other than kaposiform hemangioendothelioma or tufted angioma. The only way to know is for your child to see a doctor.

##### Diagnosis of kaposiform hemangioendothelioma and tufted angioma

If a physical exam and MRI clearly show the tumor is a kaposiform hemangioendothelioma or a tufted angioma, a biopsy may not be needed. A biopsy is not always done because serious bleeding can occur. An ultrasound exam may also be used to diagnose a tufted angioma.

Learn more about Tests to diagnose childhood vascular tumors.

##### Treatment of kaposiform hemangioendothelioma and tufted angioma

Kaposiform hemangioendothelioma and tufted angioma are best treated by a vascular anomaly specialist. Treatment depends on the symptoms, size and location of the tumor, and the risk of bleeding. Infection, delay in treatment, and surgery can cause bleeding that is life-threatening.

Kaposiform hemangioendothelioma and tufted angioma may be called uncomplicated or complicated.

Uncomplicated tumors are in one area, smaller, cause few or no symptoms, and have a lower risk of bleeding. People with an uncomplicated tumor do not have Kasabach-Merritt phenomenon.

Treatment for uncomplicated kaposiform hemangioendothelioma and tufted angioma may include:

- observation for tumors with a low risk of getting worse
- surgery to remove the tumor
- laser surgery
- topical therapy (steroids or tacrolimus)
- beta-blocker therapy (propranolol)
- targeted therapy (sirolimus) with or without steroid therapy

Complicated tumors are larger, may cause symptoms, and affect how the body functions. People with a complicated tumor may have Kasabach-Merritt phenomenon, a serious condition that can be life-threatening and requires treatment.

Treatment for complicated kaposiform hemangioendothelioma and tufted angioma may include:

- chemotherapy, with or without steroid therapy
- targeted therapy (sirolimus), with or without steroid therapy
- surgery, with or without embolization

Even with treatment, these tumors do not fully go away and can come back. Pain and inflammation may get worse with age, often around puberty. Long-term effects include chronic pain, heart failure, bone problems, and lymphedema (the build up of lymph fluid in tissues).

Learn more about these treatments in Types of treatment for childhood vascular tumors.

### Intermediate tumors that may spread to other parts of the body

Rarely, intermediate tumors spread to other parts of the body (metastasize).

#### Pseudomyogenic (epithelioid sarcoma–like) hemangioendothelioma

Pseudomyogenic hemangioendothelioma can occur in children, but is most common in men aged 20 to 50 years. This tumor is rare, and usually occurs on or under the skin or in bone. Pseudomyogenic hemangioendothelioma may appear as a lump in soft tissue or may cause pain in the affected area. It may spread to nearby tissue but usually does not spread to other parts of the body. In most cases, there are multiple tumors. Talk to your child's doctor if you think your child may have pseudomyogenic hemangioendothelioma.

If your child has symptoms that suggest pseudomyogenic hemangioendothelioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

Treatment of pseudomyogenic hemangioendothelioma may include:

- surgery to remove the tumor when possible or amputation may be needed when there are multiple tumors in the bone
- chemotherapy
- targeted therapy (pazopanib)

Because pseudomyogenic hemangioendothelioma is so rare in children, treatment options are based on clinical trials in adults.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Retiform hemangioendothelioma

Retiform hemangioendothelioma is a slow-growing, flat tumor that occurs in young adults and sometimes children. This tumor usually occurs on or under the skin of the arms, legs, and trunk. It usually does not spread to other parts of the body. Talk to your child's doctor if you think your child may have a retiform hemangioendothelioma.

If your child has symptoms that suggest retiform hemangioendothelioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

Treatment of retiform hemangioendothelioma may include:

- surgery to remove the tumor
- radiation therapy and chemotherapy when surgery cannot be done or when the tumor has come back

Retiform hemangioendothelioma may come back after treatment.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Papillary intralymphatic angioendothelioma

Papillary intralymphatic angioendothelioma is also called Dabska tumor. It occurs in children and adults.

Papillary intralymphatic angioendothelioma may appear as firm, raised, purplish bumps, which may be small or large. Papillary intralymphatic angioendothelioma forms in or under the skin anywhere on the body. Sometimes the lymph nodes are affected. Talk to your child's doctor if you think your child may have papillary intralymphatic angioendothelioma.

If your child has symptoms that suggest papillary intralymphatic angioendothelioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

Treatment of papillary intralymphatic angioendothelioma is surgery.

Learn more about this treatment in Types of treatment for childhood vascular tumors.

#### Composite hemangioendothelioma

Composite hemangioendothelioma has features of both benign and malignant vascular tumors. This tumor usually occurs on or under the skin of the arms or legs. It may also occur on the skin of the head, neck, or chest. Composite hemangioendothelioma is not likely to spread to nearby tissue or to other parts of the body, but it may come back in the same place. If the tumor spreads, it usually spreads to nearby lymph nodes. Composite hemangioendothelioma occurs in children and adults.

If your child has symptoms that suggest composite hemangioendothelioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

Treatment of composite hemangioendothelioma may include:

- surgery to remove the tumor
- radiation therapy and chemotherapy for tumors that have spread

Composite hemangioendothelioma may come back after treatment.

Learn more about these treatments in Types of treatment for childhood vascular tumors.

#### Kaposi sarcoma

Kaposi sarcoma is a cancer that causes lesions to grow in the skin; the mucous membranes lining the mouth, nose, and throat; lymph nodes; or other organs. It is caused by human herpesvirus 8. This cancer rarely occurs in children. In the United States, Kaposi sarcoma occurs most often in children who have a weak immune system caused by rare immune system disorders, HIV infection, or drugs used in organ transplants. In sub-Saharan Africa, Kaposi sarcoma is endemic and often occurs in children and young adults.

Kaposi sarcoma are lesions that form in the skin, mouth, or throat. The lesions are red, purple, or brown and change from flat, to raised, to scaly areas called plaques, to nodules. Sometimes Kaposi sarcoma causes swollen lymph nodes. These symptoms may be caused by problems other than Kaposi sarcoma. The only way to know is to see your child's doctor.

If your child has symptoms that suggest Kaposi sarcoma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

Treatment of Kaposi sarcoma may include:

- chemotherapy
- immunotherapy (interferon)
- radiation therapy
- antiretroviral therapy

Learn more about these treatments in the Types of treatment for childhood vascular tumors.

Because Kaposi sarcoma is so rare in children, some treatment options are based on clinical trials in adults. Learn more at Kaposi Sarcoma Treatment.

### Malignant tumors

Malignant tumors are cancer.

#### Epithelioid hemangioendothelioma

Epithelioid hemangioendothelioma can occur in children, but is most common in adults aged 30 to 50 years. It may occur in the liver, lung, bone, skin, or soft tissue. Epithelioid hemangioendothelioma may be fast growing or slow growing. In about a third of patients with a tumor in the soft tissue, the tumor spreads to other parts of the body very quickly.

##### Symptoms of epithelioid hemangioendothelioma

The symptoms of epithelioid hemangioendothelioma depend on where the tumor is in the body. It's important to check with your child's doctor if your child has:

- red-brown patches on the skin that are raised and rounded or flat and feel warm
- early symptoms of lesions in the lung, which may not occur in all children with lung lesions:
  - chest pain
  - spitting up blood
  - anemia (weakness, feeling tired, or looking pale)
  - trouble breathing (from scarred lung tissue)
- broken bones
- symptoms of lesions in the liver:
  - itching
  - yellowing of the skin or eye

These symptoms may be caused by problems other than an epithelioid hemangioendothelioma. The only way to know is for your child to see a doctor.

##### Diagnosis of epithelioid hemangioendothelioma

If your child has symptoms that suggest epithelioid hemangioendothelioma, the doctor will ask about your child's personal health history and do a physical exam to make the diagnosis. The doctor may also order tests. Epithelioid hemangioendothelioma in the liver is found with an ultrasound exam, CT scan or MRI scan. X-rays of the chest or other areas of the body may also be done. Learn more about Tests to diagnose childhood vascular tumors.

##### Treatment of epithelioid hemangioendothelioma

Treatment of slow-growing epithelioid hemangioendothelioma may be observation. Surgery may be used when it is possible to remove the tumor.

Treatment of fast-growing epithelioid hemangioendothelioma may include:

- surgery to remove the tumor when possible
- immunotherapy (interferon) for tumors that are likely to spread
- targeted therapy (pazopanib or sirolimus) for tumors that are likely to spread
- chemotherapy
- radiation therapy
- palliative care

Learn more about these treatments in the Types of treatment for childhood vascular tumors.

#### Angiosarcoma

Angiosarcoma is a fast-growing tumor that forms in blood vessels or lymph vessels in any part of the body, usually in the soft tissue. Most angiosarcoma is in the skin or in the soft tissue near the skin. Those in deeper soft tissue can form in the liver, spleen, and lung.

Angiosarcoma is very rare in children. Children sometimes have more than one tumor in the skin, liver, or both.

##### Causes and risk factors for angiosarcoma

A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop angiosarcoma. And it can develop in some children who don't have a known risk factor. Risk factors for angiosarcoma include:

- being exposed to radiation
- chronic (long-term) lymphedema, a condition in which extra lymph fluid builds up in tissues and causes swelling
- having a benign vascular tumor

Rarely, a benign vascular tumor, such as a hemangioma, may become an angiosarcoma.

Talk with your child's doctor if you think your child may be at risk.

##### Symptoms of angiosarcoma

Symptoms of angiosarcoma depend on where the tumor is and may include:

- red patches on the skin that bleed easily
- purple tumors

These symptoms may be caused by problems other than an angiosarcoma. The only way to know is for your child to see a doctor.

##### Diagnosis of angiosarcoma

To make a diagnosis, the doctor will ask about your child's personal health history and do a physical exam. If needed, tests may be ordered. Learn about Tests to diagnose childhood vascular tumors.

##### Treatment of angiosarcoma

Treatment of angiosarcoma may include:

- surgery to completely remove the tumor
- a combination of surgery, chemotherapy, and radiation therapy for angiosarcoma that has spread
- palliative care

Learn more about these treatments in Types of treatment for childhood vascular tumors.

## Types of treatment for childhood vascular tumors

### Who treats children with vascular tumors?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for childhood vascular tumors. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and also specialize in certain areas of medicine. Other specialists may include:

- pediatric vascular anomaly specialist (expert in treating children with vascular tumors)
- pediatric surgeon
- pediatric dermatologist
- pediatric hematologist and oncologist
- orthopedic surgeon
- radiation oncologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker

### Treatment options

There are different types of treatment for children and adolescents with vascular tumors. You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the tumor is located, your child's age and overall health, the type of vascular tumor, the risk of scarring, and the likelihood of completely treating the vascular tumor.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Types of treatment your child might have include:

#### Beta-blocker therapy

Beta-blockers are drugs commonly used to lower blood pressure and heart rate, but they can also shrink certain types of vascular tumors, such as infantile hemangiomas. Beta-blocker therapy may be injected into a vein, taken by mouth, or placed on the skin (topical). How beta-blocker therapy is given depends on the type of vascular tumor being treated and where it first formed.

The beta-blocker propranolol is usually the first treatment for hemangiomas. Infants younger than 4 weeks, who have an underlying condition, or who are treated with IV propranolol may need to have their treatment started in a hospital. Infantile hemangioma may also be treated with propranolol and steroid therapy or propranolol and topical beta-blocker therapy. Propranolol is also used to treat benign vascular tumors of liver.

Other beta-blockers used to treat vascular tumors include atenolol, nadolol, and timolol.

#### Surgery

The following types of surgery may be used to remove many types of vascular tumors:

- Excision is surgery to remove the entire tumor and some of the healthy tissue around it.
- Laser surgery uses a laser beam (a narrow beam of intense light) as a knife to make bloodless cuts in tissue or remove a skin lesion such as a tumor. Surgery with a pulsed dye laser may be used for some hemangiomas. This type of laser uses a beam of light that targets blood vessels in the skin. The light is changed into heat and the blood vessels are destroyed without damaging nearby skin.
- Curettage uses a small, spoon-shaped instrument with a sharp edge called a curette to remove abnormal tissue.
- Total hepatectomy and liver transplant removes the entire liver followed by a transplant of a healthy liver from a donor.
- Amputation removes an arm or leg when there are multiple tumors in the bone.

The type of surgery used depends on the type of vascular tumor and where it formed in the body.

After the doctor removes all the cancer that can be seen at the time of the surgery, some people may be given chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Photocoagulation

Photocoagulation is the use of an intense beam of light, such as a laser, to seal off blood vessels or destroy tissue. It is used to treat pyogenic granuloma.

#### Cryotherapy

Cryotherapy uses an instrument to freeze and destroy abnormal tissue, such as abnormal blood vessels in pyogenic granuloma. This type of treatment is also called cryosurgery.

Learn more about Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery).

#### Embolization

Embolization uses particles, such as tiny gelatin sponges or beads, to block blood vessels in the liver. It may be used to block blood flow to some benign vascular tumors of the liver and kaposiform hemangioendothelioma.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of tumor cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment.

For some vascular tumors, chemotherapy is injected into a vein. When given this way, the drugs enter the bloodstream to reach tumor cells throughout the body.

Chemotherapy drugs that may be used alone or in combination to treat childhood vascular tumors include:

- bleomycin (https://www.cancer.gov/about-cancer/treatment/drugs/bleomycin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- pegylated doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Sclerotherapy

Sclerotherapy destroys the tumor and the blood vessels that lead to it. A liquid is injected into the blood vessels, causing them to scar and break down. Over time, the destroyed blood vessels are absorbed into normal tissue. The blood flows through nearby healthy veins instead. Sclerotherapy is used to treat epithelioid hemangioma.

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill tumor cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with the tumor. It is used to treat some vascular tumors.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells. Different types of targeted therapy are being used or studied to treat childhood vascular tumors:

- pazopanib (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
- sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Interferon is a type of immunotherapy used to treat vascular tumors.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

#### Other drug therapy

Other drugs used to treat childhood vascular tumors or manage their effects include:

- Steroid therapy: Steroids are hormones made naturally in the body. They can also be made in a laboratory and used as drugs. Steroid drugs help shrink some vascular tumors. Corticosteroids, such as prednisone and methylprednisolone, are used to treat infantile hemangioma.
- Immunosuppressant therapy: These drugs decrease the body's immune responses. Immunosuppressant therapy has been used to help shrink vascular tumors. Topical tacrolimus is used to treat kaposiform hemangioendotheliomas and tufted angiomas.
- Thyroid hormone replacement therapy: These drugs replace hormones made by the thyroid and are used to treat a rare form of hypothyroidism caused by some vascular tumors, such as liver hemangiomas.

#### Observation

Observation is closely monitoring a person's condition without giving any treatment until symptoms appear or change.

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Side effects and late effects of treatment

Treatments for vascular tumors can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the vascular tumor may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the tumor has come back.

Learn more about follow-up tests in Tests to diagnose childhood vascular tumors.

## Coping with your child's vascular tumor

When your child has a tumor, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Soft Tissue Sarcoma Home Page (https://www.cancer.gov/types/soft-tissue-sarcoma)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood vascular tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Vascular Tumors. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/soft-tissue-sarcoma/patient/child-vascular-tumors-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 27253005]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).